# Cancer Therapy Interactions With Foods and Dietary Supplements (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of foods, dietary supplements, and cancer therapy interactions in people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

This cancer information summary provides an overview on cancer therapy interactions with different foods and dietary supplements.

This summary contains the following key information:

- The combination of cancer drugs taken by patients and the complementary and alternative medicine used may interact, causing adverse outcomes.
- Research on dietary supplement and cancer drug pharmacokinetics (PK) interactions is limited, but there is evidence for several possible interactions and adverse reactions.
- For many specific antioxidant supplements, there is insufficient information available to determine if they are safe and effective as a complementary therapy to standard cancer treatment.
- Certain constituents of foods and dietary supplements (e.g., St. John’s wort, grapefruit juice, and epigallocatechin gallate from green tea) can alter the PK of specific types of drugs.
- Some research has shown a dietary supplement/food and drug PK interaction between grapefruit juice and imatinib.

## General Information

For adult cancer patients in the United States, the frequency of complementary and alternative medicine (CAM) use is approximately 36%.[1] It is possible that the combination of cancer drugs taken by these patients and the CAM they use may interact, causing adverse outcomes.[2-4] When dietary supplements/herbs and cancer drugs are taken together, there is always a risk of the supplement having an impact on the pharmacokinetics (PK) or pharmacodynamics (PD) of the drug. Many drug interactions occur from the effects of the supplement on specific enzymes or on components involved in the PK of the drug, such as how the drug is metabolized and transported. Reporting and studying these interactions is important, so health care professionals can help patients navigate CAM usage with standard cancer therapies, thus avoiding preventable adverse outcomes. Integrative oncology consultations available in a number of cancer care settings can engage patients in evidence-based discussions about recommending or stopping supplements, as well as addressing questions about alternative therapies.[5]

In the United States, dietary supplements are regulated by the U.S. Food and Drug Administration (FDA) as a separate category from foods, cosmetics, and drugs. Unlike drugs, dietary supplements do not require premarket evaluation and approval by the FDA unless specific disease prevention or treatment claims are made. The quality and amount of ingredients in dietary supplements are also regulated by the FDA through Good Manufacturing Practices (GMPs). The FDA GMPs requires that every finished batch of dietary supplement meets each product specification for identity, purity, strength, composition, and limits on contamination that may adulterate dietary supplements. Because dietary supplements are not formally reviewed for manufacturing consistency every year, ingredients may vary considerably from lot to lot and there is no guarantee that ingredients claimed on product labels are present (or are present in the specified amounts). The FDA has not approved the use of dietary supplements as a treatment for cancer patients.

### Cytochrome P450 Inhibitors/Inducers

One of the main group of enzymes involved in the metabolism of many cancer drugs is the cytochrome P450 (CYP) superfamily of enzymes. These enzymes play an important role in the activation and inactivation of various drugs. Another component involved in the metabolism and excretion of many drugs is the transport protein, P-glycoprotein (P-gp). P-gp works in the intestine as a drug efflux pump regulating the bioavailability of the drug. Various anticancer drugs are substrates of P-gp; thus, if P-gp or any CYP enzyme is impacted, the drug it is processing will also be impacted.

The PK of a drug predicts therapeutic outcomes for the patient. Various herbs and dietary supplements are known to influence the PK of certain drugs, such as St. John’s wort. Currently, research on dietary supplement and cancer drug PK interactions is limited, but there is evidence for several possible interactions and adverse reactions.[1,6,7]

### References

Collado-Borrell R, Escudero-Vilaplana V, Romero-Jiménez R, et al.: Oral antineoplastic agent interactions with medicinal plants and food: an issue to take into account. J Cancer Res Clin Oncol 142 (11): 2319-30, 2016.27316629
Wolf CPJG, Rachow T, Ernst T, et al.: Interactions in cancer treatment considering cancer therapy, concomitant medications, food, herbal medicine and other supplements. J Cancer Res Clin Oncol 148 (2): 461-473, 2022.33864520
Lee RT, Kwon N, Wu J, et al.: Prevalence of potential interactions of medications, including herbs and supplements, before, during, and after chemotherapy in patients with breast and prostate cancer. Cancer 127 (11): 1827-1835, 2021.33524183
Harrigan M, McGowan C, Hood A, et al.: Dietary Supplement Use and Interactions with Tamoxifen and Aromatase Inhibitors in Breast Cancer Survivors Enrolled in Lifestyle Interventions. Nutrients 13 (11): , 2021.34835986
D'Andre SD, Bauer BA, Hofmann MB, et al.: Dietary supplement use and recommendations for discontinuation in an integrative oncology clinic. Support Care Cancer 31 (1): 40, 2022.36525104
He SM, Yang AK, Li XT, et al.: Effects of herbal products on the metabolism and transport of anticancer agents. Expert Opin Drug Metab Toxicol 6 (10): 1195-213, 2010.20701553
Meijerman I, Beijnen JH, Schellens JH: Herb-drug interactions in oncology: focus on mechanisms of induction. Oncologist 11 (7): 742-52, 2006 Jul-Aug.16880233

## Antioxidants

### General Information

Some common dietary antioxidants include the following:

- Vitamin C (ascorbate).
- Vitamin E.
- Flavonoids (e.g., soy isoflavones, green tea catechins).
- Beta-carotene.
- Glutathione.

Numerous anticancer agents generate reactive oxygen species, which cause decreased levels of antioxidants, deoxyribonucleic acid damage, and cancer cell death. Antioxidants are taken by many cancer patients because it is thought that the substances will protect and repair healthy cells damaged by cancer therapy.[1] There is insufficient information for many specific antioxidant supplements to determine if they are safe and effective as a complementary therapy to standard cancer treatment.

### Laboratory/Animal/Preclinical Studies

A study published in 2018 examined the pharmacokinetic interactions between imatinib (25 mg/kg orally) and vitamin A (12 mg retinol/kg orally), vitamin E (400 IU/kg orally), vitamin D3 (100 IU/kg orally), and vitamin C (500 mg/kg orally) when coadministered in rat animal models. The results showed that there was an increase in the bioavailability of imatinib with vitamins A, E , and D, and a decrease in the bioavailability of imatinib with vitamin C.[2]

A study that examined the oxidized form of ascorbate, dehydroascorbate, as a complementary supplement with chemotherapeutic drugs (i.e., doxorubicin, cisplatin, vincristine, methotrexate, and imatinib) initially found that dehydroascorbate given before doxorubicin treatment caused a reduction of therapeutic efficacy in mice with lymphoma (RL) cell–derived xenogeneic tumors. This form of ascorbate is not generally available as a dietary supplement and is not used clinically, and it has different properties and pharmacology from unoxidized or reduced ascorbate; thus, the potential clinical implications of these findings are unknown.[3]

An in vivo mouse model study observed a possible interaction between vitamin C (40 mg/kg/d) and bortezomib. There was a significant reduction in bortezomib’s anticancer activities with consumption of vitamin C.[4]

### Human/Clinical Studies

A study examined pre- and post-diagnosis antioxidant dietary supplement (selenium; multivitamins; zinc; and vitamins A, C, and E) use in postmenopausal breast cancer survivors. The results showed an increased risk of total mortality and worsened recurrence-free survival with antioxidant dietary supplement use during chemotherapy or radiation therapy.[5] A similar study investigated the outcomes for breast cancer patients using antioxidant supplements (vitamins A, C, and E; carotenoids; and coenzyme Q10) before and during treatment with cyclophosphamide, doxorubicin, and paclitaxel. The results showed an increase in hazards of recurrence and death in these patients. Though these hazard ratios are not statistically significant, they both trended in the same direction as those seen in the previous study.[6] This evidence does give reason to use these supplements with caution and indicates that more research on this topic is needed.

Alpha-tocopherol, one of eight vitamin E compounds, was investigated in a clinical trial for its impact on adverse effects from chemotherapy and radiation therapy. Initially, some research suggested that alpha-tocopherol may reduce toxicity caused by radiation therapy for head and neck cancer. Two randomized, controlled clinical trials of patients with head and neck cancer who received vitamin E supplementation at a dose of 400 IU/day have shown an association with a higher risk of tumor relapse and a decrease in cancer-free survival.[7,8]

### References

Ozben T: Antioxidant supplementation on cancer risk and during cancer therapy: an update. Curr Top Med Chem 15 (2): 170-8, 2015.25496272
Maher HM, Alzoman NZ, Shehata SM: Ultra-performance LC-MS/MS study of the pharmacokinetic interaction of imatinib with selected vitamin preparations in rats. Bioanalysis 10 (14): 1099-1113, 2018.30047806
Heaney ML, Gardner JR, Karasavvas N, et al.: Vitamin C antagonizes the cytotoxic effects of antineoplastic drugs. Cancer Res 68 (19): 8031-8, 2008.18829561
Perrone G, Hideshima T, Ikeda H, et al.: Ascorbic acid inhibits antitumor activity of bortezomib in vivo. Leukemia 23 (9): 1679-86, 2009.19369963
Jung AY, Cai X, Thoene K, et al.: Antioxidant supplementation and breast cancer prognosis in postmenopausal women undergoing chemotherapy and radiation therapy. Am J Clin Nutr 109 (1): 69-78, 2019.30668630
Ambrosone CB, Zirpoli GR, Hutson AD, et al.: Dietary Supplement Use During Chemotherapy and Survival Outcomes of Patients With Breast Cancer Enrolled in a Cooperative Group Clinical Trial (SWOG S0221). J Clin Oncol 38 (8): 804-814, 2020.31855498
Bairati I, Meyer F, Gélinas M, et al.: A randomized trial of antioxidant vitamins to prevent second primary cancers in head and neck cancer patients. J Natl Cancer Inst 97 (7): 481-8, 2005.15812073
Bairati I, Meyer F, Jobin E, et al.: Antioxidant vitamins supplementation and mortality: a randomized trial in head and neck cancer patients. Int J Cancer 119 (9): 2221-4, 2006.16841333

## Herbs

### Ginseng

#### General information

Ginseng root has commonly been used as a dietary supplement in traditional Asian medicine. There are several types of ginsengs. While there is no conclusive evidence for the health benefits of ginseng, people currently use it for the following reasons:[1,2]

- To increase overall well-being and concentration.
- To strengthen the immune system.
- To improve health conditions, such as heart disease, depression, and anxiety.

#### Laboratory/animal/preclinical studies

Most in vitro research on ginseng’s pharmacokinetic (PK) interactions found little evidence of any effects, determining a low risk of cytochrome P450 (CYP)-dependent herb-drug reactions. Overall, the evidence is mixed and inconclusive.[3-5]

#### Case study

Ginseng was suspected of being responsible for an incident of hepatotoxicity that occurred in a 26-year-old male taking imatinib. The hypothesized mechanism for this interaction was inhibition of hepatic CYP3A4, the enzyme primarily responsible for metabolizing imatinib. The ginseng was ingested through a ginseng energy drink, which creates uncertainty about whether the ginseng or the other ingredients in the drink caused the adverse effect. Clinical research is needed to confirm if there are any PK interactions between imatinib and ginseng.[6]

### Scutellaria baicalensis/wogonin

#### General information

Scutellaria baicalensis, also known as wogonin, Chinese skullcap, or Huang Qin, is a plant used in traditional Chinese medicine to treat various medical conditions, such as the following:[7]

- Diarrhea.
- Hepatitis.
- Infections.
- Inflammation.

In traditional Chinese medicine, there are some herbal mixtures that contain Scutellaria baicalensis, one being Huang Qin Tang. PHY906, a patented formula derived from Huang Qin Tang, is being studied as a potential adjuvant for cancer therapy; there is some evidence that this herbal mixture potentiates the anticancer effects of certain cancer drugs such as sorafenib.[8] Some research has shown the inhibitory effect of wogonin on the activity of CYP, but more research is needed to determine interactions with specific drugs.[9]

#### Laboratory/animal/preclinical studies

A 2016 study investigated the effects of a Scutellariae radix decoction on methotrexate pharmacokinetics in rats. The study revealed an increased systemic methotrexate exposure when given together with the Scutellariae radix decoction. Giving them together is thought to have effects on multidrug resistance–associated proteins and breast cancer resistance protein.[10]

A 2018 study examined the PK profile and herb-drug interactions of oral wogonin and intravenous docetaxel in rats with mammary tumors. The investigators found that in rats receiving oral wogonin and docetaxel, the area under the concentration versus time curve (AUC), initial peak serum concentration (C_max_), and half-life for docetaxel increased. The investigators speculated that these increases resulted from the inhibitory effect of wogonin on CYP3A and P-glycoprotein (P-gp). More research is needed with human clinical trials, but these results suggest a possible interaction between wogonin and docetaxel.[11]

### St. John’s Wort

#### General information

The flower of the St. John’s wort (SJW) (Hypericum perforatum) plant is used traditionally for wound healing, insomnia, and kidney and lung problems, and most commonly today for depression. This flower can be taken through teas, tablets, capsules, and extracts. Currently, the evidence for the clinical efficacy of SJW is varied, but there have been reports of interactions and adverse effects with several drugs.[12]

#### Laboratory/animal/preclinical studies

A 2012 study observed the effects of SJW on the PK of methotrexate in a rat animal model. After coadministration of SJW (300 mg/kg and 150 mg/kg) and methotrexate, animals that received 300 mg/kg of SJW had a 163% increase in AUC and a 60% increase in C_max_ for methotrexate. For animals that received 150 mg/kg of SJW, an increase in AUC (55%) for methotrexate was observed. Overall, the mortality of the rats treated with SJW combined with methotrexate was higher. The researchers suggested using extreme caution if coadministering these two substances.[13]

#### Human/clinical studies

There are two well-known examples of herb-drug interactions impacting drug PK that have clinical evidence. These two interactions are between SJW and both irinotecan and imatinib. After patients were treated with both irinotecan (350 mg/m^2^) and SJW (900 mg/d), one study found a 42% decrease in plasma levels of SN-38, the active metabolite of irinotecan. The researchers hypothesized that components of SJW extract, pseudohypericin and hyperforin, interacted with CYP3A4 isoform and P-gp, causing reduction in SN-38. This interaction may cause a loss of irinotecan efficacy.[14]

A similar outcome occurred in two studies that examined treatment with imatinib (400 mg) and SJW (300 mg 3 times a day). In one study, SJW caused a 32% decrease in AUC, a 29% decrease in C_max_, and a 21% decrease in half-life after two weeks of combined treatment with SJW and imatinib.[15] The second study found that SJW use caused a 43% increase in the clearance of imatinib and a 30% decrease in AUC. This interaction is also thought to be caused by the impact of SJW on CYP3A4, the major enzyme that metabolizes imatinib.[16]

Another CYP3A4 substrate that may be impacted by SJW is docetaxel. A 2014 study with ten cancer patients investigated the PK interactions of docetaxel (135 mg IV for 60 min) in combination with SJW (300 mg orally for 14 days). The results showed a statistically significant decrease of 12% in mean AUC and an increased clearance of docetaxel.[17]

Although there is a lack of published research, the use of SJW in patients undergoing treatment with ixabepilone is not recommended. SJW may cause a decrease in plasma concentrations of ixabepilone. The drug label for ixabepilone states a warning for this possible interaction.[18]

### Thunder God Vine

#### General information

Thunder god vine, also known as Tripterygium wilfordii Hook f, is an herb traditionally used in Chinese medicine for its possible anti-inflammatory, immunosuppressant, and anticancer effects.[19] Studies have found that triptolide and celastrol, the active components of thunder god vine, are responsible for these possible effects. Clinical observations, mostly from China, reported significant multiorgan toxicities from the traditional raw material or the extracts. Deaths associated with ingesting these materials have been frequently reported.[20,21] Frequency of severe-grade adverse events from the extracts ranged from 5% to 8%,[22,23] with the global incidence of adverse events at 30.8% (95% confidence interval, 21.2–40.3).[23] The most frequently reported adverse events are intestinal toxicity (13.9%), reproductive toxicity (10.2%), hepatotoxicity (6.8%), nephrotoxicity (13.6%), hematotoxicity (5.7%), and cutaneous toxicity (<5%).[23] Evidence varies for herb-drug interactions and toxicity, which are potentially caused by inhibiting effects on the activity of the CYP450 enzyme system.[24] Specifically, celastrol inhibits five cytochrome P450 isoenzymes (CYP1A2, CYP2C19, CYP2D6, CYP2E1, and CYP3A4) in vitro.[25] In addition, a study also found that the coadministration of the CYP3A4 inhibitor, ritonavir, or the inducer, dexamethasone, leads to a significant increase or decrease of the plasma concentration levels of triptolide.[26]

#### Laboratory/animal/preclinical studies

A 2017 study investigated the effects of triptolide (10 mg/kg) on the PKs of three different sorafenib doses (20, 50, and 100 mg/kg) in rats. The results showed an increase in C_max_ and AUC for each sorafenib dose and a decrease in clearance with pretreatment of triptolide. It is hypothesized that this interaction occurred due to triptolide’s possible inhibiting effects on P-gp and CYP3A4 enzymatic activity.[27]

### References

Wang CZ, Yuan CS: Ginseng, American. In: Coates PM, Betz JM, Blackman MR, et al., eds.: Encyclopedia of Dietary Supplements. 2nd ed. Informa Healthcare, 2010, pp 339-47.
Jia L, Soldati F: Ginseng, Asian. In: Coates PM, Betz JM, Blackman MR, et al., eds.: Encyclopedia of Dietary Supplements. 2nd ed. Informa Healthcare, 2010, pp 348-62.
Collado-Borrell R, Escudero-Vilaplana V, Romero-Jiménez R, et al.: Oral antineoplastic agent interactions with medicinal plants and food: an issue to take into account. J Cancer Res Clin Oncol 142 (11): 2319-30, 2016.27316629
Goey AK, Mooiman KD, Beijnen JH, et al.: Relevance of in vitro and clinical data for predicting CYP3A4-mediated herb-drug interactions in cancer patients. Cancer Treat Rev 39 (7): 773-83, 2013.23394826
Haefeli WE, Carls A: Drug interactions with phytotherapeutics in oncology. Expert Opin Drug Metab Toxicol 10 (3): 359-77, 2014.24387348
Bilgi N, Bell K, Ananthakrishnan AN, et al.: Imatinib and Panax ginseng: a potential interaction resulting in liver toxicity. Ann Pharmacother 44 (5): 926-8, 2010.20332334
Wang ZL, Wang S, Kuang Y, et al.: A comprehensive review on phytochemistry, pharmacology, and flavonoid biosynthesis of Scutellaria baicalensis. Pharm Biol 56 (1): 465-484, 2018.31070530
Lam W, Jiang Z, Guan F, et al.: PHY906(KD018), an adjuvant based on a 1800-year-old Chinese medicine, enhanced the anti-tumor activity of Sorafenib by changing the tumor microenvironment. Sci Rep 5: 9384, 2015.25819872
Li T, Li N, Guo Q, et al.: Inhibitory effects of wogonin on catalytic activity of cytochrome P450 enzyme in human liver microsomes. Eur J Drug Metab Pharmacokinet 36 (4): 249-56, 2011.21713461
Yu CP, Hsieh YC, Shia CS, et al.: Increased Systemic Exposure of Methotrexate by a Polyphenol-Rich Herb via Modulation on Efflux Transporters Multidrug Resistance-Associated Protein 2 and Breast Cancer Resistance Protein. J Pharm Sci 105 (1): 343-9, 2016.26852865
Wang T, Long F, Jiang G, et al.: Pharmacokinetic properties of wogonin and its herb-drug interactions with docetaxel in rats with mammary tumors. Biomed Chromatogr : e4264, 2018.29679509
Field HL, Monti DA, Greeson JM, et al.: St. John's Wort. Int J Psychiatry Med 30 (3): 203-19, 2000.11209989
Yang SY, Juang SH, Tsai SY, et al.: St. John's wort significantly increased the systemic exposure and toxicity of methotrexate in rats. Toxicol Appl Pharmacol 263 (1): 39-43, 2012.22699020
Mathijssen RH, Verweij J, de Bruijn P, et al.: Effects of St. John's wort on irinotecan metabolism. J Natl Cancer Inst 94 (16): 1247-9, 2002.12189228
Smith P, Bullock JM, Booker BM, et al.: The influence of St. John's wort on the pharmacokinetics and protein binding of imatinib mesylate. Pharmacotherapy 24 (11): 1508-14, 2004.15537555
Frye RF, Fitzgerald SM, Lagattuta TF, et al.: Effect of St John's wort on imatinib mesylate pharmacokinetics. Clin Pharmacol Ther 76 (4): 323-9, 2004.15470331
Goey AK, Meijerman I, Rosing H, et al.: The effect of St John's wort on the pharmacokinetics of docetaxel. Clin Pharmacokinet 53 (1): 103-10, 2014.24068654
IXEMPRA - ixabepilone. Bristol-Myers Squibb Company, 2009. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2009/022065s002lbl.pdf). Last accessed May 26, 2022.
Ziaei S, Halaby R: Immunosuppressive, anti-inflammatory and anti-cancer properties of triptolide: A mini review. Avicenna J Phytomed 6 (2): 149-64, 2016 Mar-Apr.27222828
Zhang C, Sun PP, Guo HT, et al.: Safety Profiles of Tripterygium wilfordii Hook F: A Systematic Review and Meta-Analysis. Front Pharmacol 7: 402, 2016.27877128
Chou WC, Wu CC, Yang PC, et al.: Hypovolemic shock and mortality after ingestion of Tripterygium wilfordii hook F.: a case report. Int J Cardiol 49 (2): 173-7, 1995.7628889
Adverse Drug Reaction Information Circular (no. 46) Focuses on the Drug Safety of Triptolide Preparations. National Medical Products Administration, 2012. Available online (https://www.nmpa.gov.cn/xxgk/yjjsh/ypblfytb/20120401101301366.html). Last accessed March 10, 2022.
Ru Y, Luo Y, Zhou Y, et al.: Adverse Events Associated With Treatment of Tripterygium wilfordii Hook F: A Quantitative Evidence Synthesis. Front Pharmacol 10: 1250, 2019.31780926
Jin C, Wu Z, Wang L, et al.: CYP450s-Activity Relations of Celastrol to Interact with Triptolide Reveal the Reasons of Hepatotoxicity of Tripterygium wilfordii. Molecules 24 (11): , 2019.31181731
Jin C, He X, Zhang F, et al.: Inhibitory mechanisms of celastrol on human liver cytochrome P450 1A2, 2C19, 2D6, 2E1 and 3A4. Xenobiotica 45 (7): 571-7, 2015.25811791
Xu Y, Zhang YF, Chen XY, et al.: CYP3A4 inducer and inhibitor strongly affect the pharmacokinetics of triptolide and its derivative in rats. Acta Pharmacol Sin 39 (8): 1386-1392, 2018.29283173
Wang X, Zhang X, Liu F, et al.: The effects of triptolide on the pharmacokinetics of sorafenib in rats and its potential mechanism. Pharm Biol 55 (1): 1863-1867, 2017.28614959

## Foods

### Grapefruit

#### General information

Grapefruit and other similar fruits, such as Seville orange, pomelo, and lime, have been known to interact with a variety of drugs, including some anticancer drugs. These pharmacokinetic interactions may be caused by the furanocoumarin components found in the seeds of grapefruit. These components have been observed impacting the metabolism of substrates of CYP3A4.[1-3]

#### Laboratory/animal/preclinical studies

Grapefruit and its furanocoumarin components have been studied for their potential antioxidative, anti-inflammatory, and anticancer effects in in vitro and in vivo studies.[4]

#### Human/clinical studies

Some research has shown a dietary supplement/food and drug PK interaction between grapefruit juice and imatinib. Grapefruit juice may cause plasma levels of imatinib to increase by inhibiting CYP3A4, in turn triggering organ toxicity.[5]

An interaction has been observed between grapefruit juice and etoposide. A randomized, crossover, pilot study of six participants examined the bioavailability of the oral chemotherapy drug etoposide after coadministration of grapefruit juice. The data showed a decrease in bioavailability between the control group and the experimental group, who were treated with etoposide and grapefruit juice. The bioavailability of etoposide (50 mg orally) reduced from approximately 73% to 52% after pretreatment with grapefruit juice (100 mL). This resulted in a decrease in the area under the concentration versus time curve (AUC) by 26% for etoposide with grapefruit juice, compared with etoposide alone.[6]

Other studies have found an increase in the bioavailability of sunitinib with grapefruit juice exposure,[7] and an increase in AUC by 29% and an increase in peak serum concentration (C_max_) by 60% for nilotinib (400 mg orally) was also observed when combined with grapefruit juice (240 mL).[8]

### Green Tea

#### General information

Green tea, green tea extract, and products of green tea components are commonly taken as foods, dietary supplements, and herbal therapies. Some of the traditional and modern uses of green tea include the following:

- Preventing and treating cancer.
- Lowering cholesterol.
- Promoting weight loss.
- Improving mental alertness.
- Helping with digestive symptoms.

Research has been mixed on whether green tea is safe or effective for these uses as well as for coadministration with anticancer drugs.[9] Current research shows that green tea and the polyphenol epigallocatechin gallate (EGCG), an antioxidant component of green tea, can impact the PK or pharmacodynamics (PD) of certain drugs, thus impacting the metabolism and effectiveness of these drugs.[10]

#### Laboratory/animal/preclinical studies

As seen in the literature, green tea and its constituent EGCG may be involved in both PK and PD interactions. An interaction between green tea and bortezomib was examined in an in vitro study with human multiple myeloma and glioblastoma cell lines. EGCG blocked bortezomib’s protease inhibitory function by binding to the boronic acid structure in bortezomib, causing the inability to induce cancer cell death and consequently blocking its anticancer abilities. The second portion of this study investigated this interaction within a plasmacytoma xenograft nude mouse model. Bortezomib’s cancer cell apoptosis-inducing effect was completely prevented with intragastric EGCG administration (50 mg/kg).[11] This interaction was also reported in another animal study that examined human prostate cancer xenografts in immune-deficient mouse models. High intravenous (IV) doses of EGCG along with the coadministration of bortezomib resulted in the abrogation of bortezomib’s anticancer effects.[12] Human studies should be conducted to determine clinical significance.

The impact of green tea and EGCG on fluorouracil PK was studied in rats. The results of these studies showed a 151% increase in C_max_ and a 425% increase in AUC for fluorouracil. The researchers concluded that green tea greatly impacted the PK of fluorouracil.[13]

A similar study examined the PK of irinotecan (10 mg/kg IV) given in combination with EGCG (20 mg/kg IV) in rats and found that EGCG caused elevated plasma levels and reduced hepatobiliary excretion of irinotecan and its metabolite SN-38. This is possibly because of EGCG’s inhibitory effects on P-glycoprotein (P-gp).[14]

A 2019 study evaluated the effects of green tea extract on the PK of palbociclib in a rat animal model. The data showed a decrease in the oral bioavailability of palbociclib when it was coadministered with green tea extract, but there was no impact on the elimination of palbociclib. The altered PK was thought to be the result of interference in the absorption of palbociclib. The authors recommended against the coadministration of these compounds.[15]

Research on rat animal models investigated the impact of green tea extract on the oral bioavailability of erlotinib and lapatinib. A decrease in the oral bioavailability for erlotinib and lapatinib was observed after consumption of green tea extract (200 mg/kg). There was a decrease in AUC by 68% for erlotinib and 70% for lapatinib with short-term administration of green tea extract, and a decrease in AUC by 16% for erlotinib and 14% for lapatinib with long-term administration of green tea extract.[16]

An in vivo and in vitro study examined the impacts of intragastric coadministration of sunitinib with EGCG. Coadministration of these two solutions resulted in the formation of a precipitate in the stomachs of the mice, thus decreasing its bioavailability. It was also reported that a decrease in the AUC and C_max_ of plasma sunitinib with EGCG administration in rats resulted in reduced sunitinib absorption.[17]

A possible interaction was also found between EGCG and tamoxifen. A 2009 study assessed the bioavailability and PK of tamoxifen (2 mg/kg) and its metabolite, 4-hydroxytamoxifen, with coadministration of EGCG (0.5 mg/kg, 3 mg/kg, and 10 mg/kg) in Sprague-Dawley rats. The coadministration of EGCG at doses of 3 mg/kg and 10 mg/kg caused a 49% to 78% increase in the bioavailability of tamoxifen. In addition, EGCG significantly impacted the formation of 4-hydroxytamoxifen. It is believed that this reaction was caused by EGCG’s inhibitory effect on P-gp and CYP3A.[18] However, a subsequent study analyzed the effect of a green tea extract (1 g twice daily, 300 mg EGCG) on endoxifen (active metabolite of tamoxifen) levels. The study did not demonstrate a PK interaction between the green tea supplement and endoxifen levels.[19]

The findings of the preclinical studies provide a justification and motivation for human studies to determine appropriate clinical recommendations.

#### Case study

In addition to the in vitro and in vivo EGCG and sunitinib study mentioned above, the same researchers published a case study that might demonstrate a possible adverse effect of green tea consumption with sunitinib treatment. A male patient with metastatic renal cell carcinoma who received sunitinib reported worsened symptoms of hyperemia and eye swelling near the site of a metastatic lesion when drinking green tea; the symptoms improved when he stopped taking green tea. The authors hypothesized that the lack of symptom control may result from EGCG’s effects on sunitinib’s anticancer abilities.[17]

### References

Mouly S, Lloret-Linares C, Sellier PO, et al.: Is the clinical relevance of drug-food and drug-herb interactions limited to grapefruit juice and Saint-John's Wort? Pharmacol Res 118: 82-92, 2017.27693910
Singh BN: Effects of food on clinical pharmacokinetics. Clin Pharmacokinet 37 (3): 213-55, 1999.10511919
Paine MF, Widmer WW, Hart HL, et al.: A furanocoumarin-free grapefruit juice establishes furanocoumarins as the mediators of the grapefruit juice-felodipine interaction. Am J Clin Nutr 83 (5): 1097-105, 2006.16685052
Hung WL, Suh JH, Wang Y: Chemistry and health effects of furanocoumarins in grapefruit. J Food Drug Anal 25 (1): 71-83, 2017.28911545
He SM, Yang AK, Li XT, et al.: Effects of herbal products on the metabolism and transport of anticancer agents. Expert Opin Drug Metab Toxicol 6 (10): 1195-213, 2010.20701553
Reif S, Nicolson MC, Bisset D, et al.: Effect of grapefruit juice intake on etoposide bioavailability. Eur J Clin Pharmacol 58 (7): 491-4, 2002.12389073
van Erp NP, Baker SD, Zandvliet AS, et al.: Marginal increase of sunitinib exposure by grapefruit juice. Cancer Chemother Pharmacol 67 (3): 695-703, 2011.20512335
Yin OQ, Gallagher N, Li A, et al.: Effect of grapefruit juice on the pharmacokinetics of nilotinib in healthy participants. J Clin Pharmacol 50 (2): 188-94, 2010.19948946
Sang S, Lambert JD, Ho C, et al.: Green tea polyphenols. In: Coates PM, Betz JM, Blackman MR, et al., eds.: Encyclopedia of Dietary Supplements. 2nd ed. Informa Healthcare, 2010, pp 402-10.
Du GJ, Zhang Z, Wen XD, et al.: Epigallocatechin Gallate (EGCG) is the most effective cancer chemopreventive polyphenol in green tea. Nutrients 4 (11): 1679-91, 2012.23201840
Golden EB, Lam PY, Kardosh A, et al.: Green tea polyphenols block the anticancer effects of bortezomib and other boronic acid-based proteasome inhibitors. Blood 113 (23): 5927-37, 2009.19190249
Bannerman B, Xu L, Jones M, et al.: Preclinical evaluation of the antitumor activity of bortezomib in combination with vitamin C or with epigallocatechin gallate, a component of green tea. Cancer Chemother Pharmacol 68 (5): 1145-54, 2011.21400028
Qiao J, Gu C, Shang W, et al.: Effect of green tea on pharmacokinetics of 5-fluorouracil in rats and pharmacodynamics in human cell lines in vitro. Food Chem Toxicol 49 (6): 1410-5, 2011.21440026
Lin LC, Wang MN, Tsai TH: Food-drug interaction of (-)-epigallocatechin-3-gallate on the pharmacokinetics of irinotecan and the metabolite SN-38. Chem Biol Interact 174 (3): 177-82, 2008.18579105
Paul D, Surendran S, Chandrakala P, et al.: An assessment of the impact of green tea extract on palbociclib pharmacokinetics using a validated UHPLC-QTOF-MS method. Biomed Chromatogr 33 (4): e4469, 2019.30549069
Maher HM, Alzoman NZ, Shehata SM, et al.: UPLC-ESI-MS/MS study of the effect of green tea extract on the oral bioavailability of erlotinib and lapatinib in rats: Potential risk of pharmacokinetic interaction. J Chromatogr B Analyt Technol Biomed Life Sci 1049-1050: 30-40, 2017.28260629
Ge J, Tan BX, Chen Y, et al.: Interaction of green tea polyphenol epigallocatechin-3-gallate with sunitinib: potential risk of diminished sunitinib bioavailability. J Mol Med (Berl) 89 (6): 595-602, 2011.21331509
Shin SC, Choi JS: Effects of epigallocatechin gallate on the oral bioavailability and pharmacokinetics of tamoxifen and its main metabolite, 4-hydroxytamoxifen, in rats. Anticancer Drugs 20 (7): 584-8, 2009.19491656
Braal CL, Hussaarts KGAM, Seuren L, et al.: Influence of green tea consumption on endoxifen steady-state concentration in breast cancer patients treated with tamoxifen. Breast Cancer Res Treat 184 (1): 107-113, 2020.32803636

## Foods, Dietary Supplements, and Cancer Drug Interaction Tables

Table 1. Foods, Dietary Supplements, and Cancer Drug Interactions

Herbal/Dietary Supplement | Anticancer Therapy | Effect | Study Type
SJW | Irinotecan | Increased activity of CYP3A4 and decreased AUC of active metabolite SN38 | Clinical trial [1]
SJW | Imatinib | Increased clearance and decreased AUC of imatinib | Clinical trial [2]
SJW | Methotrexate | Increased AUC and C_max_ of methotrexate | Animal study [3]
SJW | Docetaxel | Increased clearance and decreased AUC of docetaxel | Clinical trial [4]
SJW | Ixabepilone | May decrease plasma concentrations of ixabepilone | Label warning for ixabepilone [5]
Green tea | Sunitinib | Decreased drug absorption and bioavailability of sunitinib | Animal study and case report [6]
Green tea | Palbociclib | Decreased oral bioavailability of palbociclib | Animal study [7]
Green tea extract | Erlotinib | Decreased AUC and oral bioavailability of erlotinib | Animal study [8]
Green tea extract | Lapatinib | Decreased AUC and oral bioavailability of lapatinib | Animal study [8]
EGCG | Tamoxifen | Increased bioavailability of tamoxifen | Animal study [9]
EGCG | Irinotecan | Increased plasma concentration of irinotecan and decreased hepatobiliary excretion of drug and its metabolite SN-38 | Animal study [10]
Green tea and EGCG | Fluorouracil | Increased AUC and C_max_ of fluorouracil | Animal and in vitro study [11]
Grapefruit | Imatinib | May increase plasma levels of imatinib by inhibiting CYP3A4 | Review [12]
Grapefruit | Etoposide | Decreased AUC and bioavailability of etoposide | Randomized, crossover, pilot study [13]
Grapefruit | Sunitinib | Increased bioavailability of sunitinib | Clinical trial [14]
Grapefruit | Nilotinib | Increased AUC and C_max_ of nilotinib | Clinical trial [15]
Vitamin A | Imatinib | Increased bioavailability of imatinib | Animal study [8]
Vitamin E | Imatinib | Increased bioavailability of imatinib | Animal study [8]
Vitamin D3 | Imatinib | Increased bioavailability of imatinib | Animal study [8]
Vitamin C | Imatinib | Decreased bioavailability of imatinib | Animal study [8]
Scutellaria baicalensis | Docetaxel | Increased AUC of drug and exposure to both drug and herb | Animal study [16]

AUC = area under the concentration versus time curve; C_max_ = peak serum concentration; EGCG = epigallocatechin gallate; SJW = St. John's wort.

Table 2. Foods, Dietary Supplements, and Cancer Drug Interactions

Anticancer Therapy | Herbal/Dietary Supplement | Effect | Study Type
Docetaxel | Scutellaria baicalensis | Increased AUC of drug and exposure to both drug and herb | Animal study [16]
Docetaxel | SJW | Increased clearance and decrease AUC of docetaxel | Clinical trial [4]
Erlotinib | Green tea extract | Decreased AUC and oral bioavailability of erlotinib | Animal study [8]
Etoposide | Grapefruit | Decreased AUC and bioavailability of etoposide | Randomized, crossover, pilot study [13]
Fluorouracil | Green tea and EGCG | Increased AUC and C_max_ of fluorouracil | Animal and in vitro study [11]
Imatinib | Grapefruit | May increase plasma levels of imatinib by inhibiting CYP3A4 | Review [12]
Imatinib | Vitamin A | Increased bioavailability of imatinib | Animal study [8]
Imatinib | Vitamin E | Increased bioavailability of imatinib | Animal study [8]
Imatinib | Vitamin D3 | Increased bioavailability of imatinib | Animal study [8]
Imatinib | Vitamin C | Decreased bioavailability of imatinib | Animal study [8]
Imatinib | SJW | Increased clearance and decreased AUC of imatinib | Clinical trial [2]
Irinotecan | SJW | Increased activity of CYP3A4 and decreased AUC of active metabolite SN38 | Clinical trial [1]
Irinotecan | EGCG | Increased plasma concentration of irinotecan and decreased hepatobiliary excretion of drug and its metabolite SN-38 | Animal study [10]
Ixabepilone | SJW | May decrease plasma concentrations of ixabepilone | Label warning for ixabepilone [5]
Lapatinib | Green tea extract | Decreased AUC and oral bioavailability of lapatinib | Animal study [8]
Methotrexate | SJW | Increased AUC and C_max_ of methotrexate | Animal study [3]
Nilotinib | Grapefruit | Increased AUC and C_max_ of nilotinib | Clinical trial [15]
Palbociclib | Green tea | Decreased oral bioavailability of palbociclib | Animal study [7]
Tamoxifen | EGCG | Increased bioavailability of tamoxifen | Animal study [9]
Sunitinib | Grapefruit | Increased bioavailability of sunitinib | Clinical trial [14]
Sunitinib | Green tea | Decreased drug absorption and bioavailability of sunitinib | Animal study and case report [6]

AUC = area under the concentration versus time curve; C_max_ = peak serum concentration; EGCG = epigallocatechin gallate; SJW = St. John's wort.

Table 3. Foods, Dietary Supplements, and Cancer Therapies Adverse Reaction

Herbal/Dietary Supplement | Cancer Therapy | Adverse Reaction | Study Type
Vitamin C | Doxorubicin, cisplatin, vincristine, methotrexate, and imatinib | Dose-dependent decrease in apoptosis with all chemotherapeutic drugs tested | Animal study [17]
Vitamin C | Bortezomib | Decreased bortezomib’s anticancer activities | Animal study [18]
Dl-alpha-tocopherol (vitamin E) | Radiation therapy | Higher risk of tumor relapse and increased all-cause mortality | Clinical trial [19,20]
Ginseng | Imatinib | Incident of hepatotoxicity | Case report [21]
EGCG or green tea extract | Bortezomib | Decreased anticancer effect by neutralizing effects of bortezomib | In vitro and animal study [22]
EGCG | Bortezomib | Decreased bortezomib’s anticancer effect | Animal study [23]
Green tea | Sunitinib | Decreased anticancer effect, worsened symptoms | Preclinical research and case report [6]

EGCG = epigallocatechin gallate.

### References

Mathijssen RH, Verweij J, de Bruijn P, et al.: Effects of St. John's wort on irinotecan metabolism. J Natl Cancer Inst 94 (16): 1247-9, 2002.12189228
Frye RF, Fitzgerald SM, Lagattuta TF, et al.: Effect of St John's wort on imatinib mesylate pharmacokinetics. Clin Pharmacol Ther 76 (4): 323-9, 2004.15470331
Yang SY, Juang SH, Tsai SY, et al.: St. John's wort significantly increased the systemic exposure and toxicity of methotrexate in rats. Toxicol Appl Pharmacol 263 (1): 39-43, 2012.22699020
Clairet AL, Boiteux-Jurain M, Curtit E, et al.: Interaction between phytotherapy and oral anticancer agents: prospective study and literature review. Med Oncol 36 (5): 45, 2019.30993543
IXEMPRA - ixabepilone. Bristol-Myers Squibb Company, 2009. Available online (https://www.accessdata.fda.gov/drugsatfda_docs/label/2009/022065s002lbl.pdf). Last accessed May 26, 2022.
Ge J, Tan BX, Chen Y, et al.: Interaction of green tea polyphenol epigallocatechin-3-gallate with sunitinib: potential risk of diminished sunitinib bioavailability. J Mol Med (Berl) 89 (6): 595-602, 2011.21331509
Paul D, Surendran S, Chandrakala P, et al.: An assessment of the impact of green tea extract on palbociclib pharmacokinetics using a validated UHPLC-QTOF-MS method. Biomed Chromatogr 33 (4): e4469, 2019.30549069
Maher HM, Alzoman NZ, Shehata SM: Ultra-performance LC-MS/MS study of the pharmacokinetic interaction of imatinib with selected vitamin preparations in rats. Bioanalysis 10 (14): 1099-1113, 2018.30047806
Shin SC, Choi JS: Effects of epigallocatechin gallate on the oral bioavailability and pharmacokinetics of tamoxifen and its main metabolite, 4-hydroxytamoxifen, in rats. Anticancer Drugs 20 (7): 584-8, 2009.19491656
Lin LC, Wang MN, Tsai TH: Food-drug interaction of (-)-epigallocatechin-3-gallate on the pharmacokinetics of irinotecan and the metabolite SN-38. Chem Biol Interact 174 (3): 177-82, 2008.18579105
Qiao J, Gu C, Shang W, et al.: Effect of green tea on pharmacokinetics of 5-fluorouracil in rats and pharmacodynamics in human cell lines in vitro. Food Chem Toxicol 49 (6): 1410-5, 2011.21440026
He SM, Yang AK, Li XT, et al.: Effects of herbal products on the metabolism and transport of anticancer agents. Expert Opin Drug Metab Toxicol 6 (10): 1195-213, 2010.20701553
Reif S, Nicolson MC, Bisset D, et al.: Effect of grapefruit juice intake on etoposide bioavailability. Eur J Clin Pharmacol 58 (7): 491-4, 2002.12389073
van Erp NP, Baker SD, Zandvliet AS, et al.: Marginal increase of sunitinib exposure by grapefruit juice. Cancer Chemother Pharmacol 67 (3): 695-703, 2011.20512335
Yin OQ, Gallagher N, Li A, et al.: Effect of grapefruit juice on the pharmacokinetics of nilotinib in healthy participants. J Clin Pharmacol 50 (2): 188-94, 2010.19948946
Wang T, Long F, Jiang G, et al.: Pharmacokinetic properties of wogonin and its herb-drug interactions with docetaxel in rats with mammary tumors. Biomed Chromatogr : e4264, 2018.29679509
Heaney ML, Gardner JR, Karasavvas N, et al.: Vitamin C antagonizes the cytotoxic effects of antineoplastic drugs. Cancer Res 68 (19): 8031-8, 2008.18829561
Perrone G, Hideshima T, Ikeda H, et al.: Ascorbic acid inhibits antitumor activity of bortezomib in vivo. Leukemia 23 (9): 1679-86, 2009.19369963
Bairati I, Meyer F, Gélinas M, et al.: Randomized trial of antioxidant vitamins to prevent acute adverse effects of radiation therapy in head and neck cancer patients. J Clin Oncol 23 (24): 5805-13, 2005.16027437
Bairati I, Meyer F, Jobin E, et al.: Antioxidant vitamins supplementation and mortality: a randomized trial in head and neck cancer patients. Int J Cancer 119 (9): 2221-4, 2006.16841333
Bilgi N, Bell K, Ananthakrishnan AN, et al.: Imatinib and Panax ginseng: a potential interaction resulting in liver toxicity. Ann Pharmacother 44 (5): 926-8, 2010.20332334
Golden EB, Lam PY, Kardosh A, et al.: Green tea polyphenols block the anticancer effects of bortezomib and other boronic acid-based proteasome inhibitors. Blood 113 (23): 5927-37, 2009.19190249
Bannerman B, Xu L, Jones M, et al.: Preclinical evaluation of the antitumor activity of bortezomib in combination with vitamin C or with epigallocatechin gallate, a component of green tea. Cancer Chemother Pharmacol 68 (5): 1145-54, 2011.21400028

## Summary of the Evidence for Cancer Therapy Interactions With Foods and Dietary Supplements

To assist readers in evaluating the results of human studies of integrative, alternative, and complementary therapies for cancer, the strength of the evidence (i.e., the levels of evidence) associated with each type of treatment is provided whenever possible. To qualify for a level of evidence analysis, a study must:

- Be published in a peer-reviewed scientific journal.
- Report on a therapeutic outcome or outcomes, such as tumor response, improvement in survival, or measured improvement in quality of life.
- Describe clinical findings in sufficient detail that a meaningful evaluation can be made.

Separate levels of evidence scores are assigned to qualifying human studies on the basis of statistical strength of the study design and scientific strength of the treatment outcomes (i.e., endpoints) measured. The resulting two scores are then combined to produce an overall score. For an explanation of the scores and additional information about levels of evidence analysis, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

## Latest Updates to This Summary (04/05/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

General Information

Revised text to state that in the United States, dietary supplements are regulated by the U.S. Food and Drug Administration (FDA) as a separate category from foods, cosmetics, and drugs. Unlike drugs, dietary supplements do not require premarket evaluation and approval by the FDA unless specific disease prevention or treatment claims are made. Also added text to state that the quality and amount of ingredients in dietary supplements are also regulated by the FDA through Good Manufacturing Practices (GMPs). The FDA GMPs requires that every finished batch of dietary supplement meets each product specification for identity, purity, strength, composition, and limits on contamination that may adulterate dietary supplements.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer therapy interactions with foods and dietary supplements in people with cancer.. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Cancer Therapy Interactions With Foods and Dietary Supplements. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/dietary-interactions-pdq. Accessed <MM/DD/YYYY>. [PMID: 33079503]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).